# Breast Cancer Screening (PDQ®)

Patient Version

This PDQ cancer information summary has current information about breast cancer screening. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Screening and Prevention Editorial Board.

## What Is Screening?

Screening is looking for signs of disease, such as breast cancer, before a person has symptoms. The goal of screening tests is to find cancer at an early stage when it can be treated and may be cured. Sometimes a screening test finds cancer that is very small or very slow growing. These cancers are unlikely to cause death or illness during a person's lifetime.

Scientists are trying to better understand which people are more likely to get certain types of cancer. For example, they look at a person's age, their family history, and certain exposures during their lifetime. This information helps doctors recommend who should be screened for cancer, which screening tests should be used, and how often the tests should be done.

It is important to remember that your doctor does not necessarily think you have cancer if he or she suggests a screening test. Screening tests are done when you have no cancer symptoms. Women who have a strong family history or a personal history of cancer or other risk factors may also be offered genetic testing.

If a screening test result is abnormal, you may need to have more tests done to find out if you have cancer. These are called diagnostic tests, rather than screening tests.

To learn more about cancer screening, visit Cancer Screening Overview.

## General Information About Breast Cancer

Key Points for This Section
- Breast cancer is a disease in which malignant (cancer) cells form in the tissues of the breast.
- Breast cancer is the second leading cause of death from cancer in American women.
- Different factors increase or decrease the risk of getting breast cancer.

### Breast cancer is a disease in which malignant (cancer) cells form in the tissues of the breast.

The breast is made up of lobes and ducts. Each breast has 15 to 20 sections called lobes, which have many smaller sections called lobules. Lobules end in dozens of tiny bulbs that can produce milk. The lobes, lobules, and bulbs are linked by thin tubes called ducts.

The female breast contains lobes, lobules, and ducts that produce and transport milk to the nipple. Fatty tissue gives the breast its shape, while muscles and the chest wall provide support. The lymphatic system, including lymph nodes, filter lymph and store white blood cells that help fight infection and disease.

Illustration of the female breast anatomy. On the left, a front view shows lymph nodes inside the breast going from the breast to the armpit. On the right, a cross-section shows the chest wall, ribs, fatty tissue, lobes, ducts, and lobules. Also shown in both panels are the muscle, nipple, and areola.

Each breast also has blood vessels and lymph vessels. The lymph vessels carry an almost colorless, watery fluid called lymph. Lymph vessels carry lymph between lymph nodes. Lymph nodes are small, bean-shaped structures that filter lymph and store white blood cells that help fight infection and disease. Groups of lymph nodes are found near the breast in the axilla (under the arm), above the collarbone, and in the chest.

Other PDQ summaries containing information related to breast cancer include:

- Breast Cancer Prevention
- Breast Cancer Treatment
- Breast Cancer Treatment During Pregnancy
- Male Breast Cancer Treatment
- Genetics of Breast and Gynecologic Cancers (written for health professionals)

### Breast cancer is the second leading cause of death from cancer in American women.

Women in the United States get breast cancer more than any other type of cancer except for skin cancer.

Breast cancer is more likely to occur as a woman ages. It occurs more often in White women than in Black women, but Black women die from breast cancer more often than White women. However, this difference could be due to factors, such as quality of the screening test, how long women wait to follow up after getting an abnormal test result, the quality of treatment, and the type of tumor.

Breast cancer rarely occurs in men. Because men with breast cancer usually have a lump that can be felt, screening tests are not likely to be helpful.

### Different factors increase or decrease the risk of getting breast cancer.

Anything that increases your chance of getting a disease is called a risk factor. Anything that decreases your chance of getting a disease is called a protective factor. Talk to your doctor if you think you may be at risk for breast cancer.

To learn more about risk factors and protective factors for breast cancer, visit Breast Cancer Prevention.

## Breast Cancer Screening

Key Points for This Section
- Tests are used to screen for different types of cancer when a person does not have symptoms.
- Mammography is the most common screening test for breast cancer.
- Magnetic resonance imaging (MRI) may be used to screen women who have a high risk of breast cancer.
- Whether a woman should be screened for breast cancer and the screening test to use depends on certain factors.
- Other screening tests have been or are being studied in clinical trials.
  - Breast exam
  - Thermography
  - Tissue sampling
  - Ultrasound exam
- Screening tests for breast cancer are being studied in clinical trials.

### Tests are used to screen for different types of cancer when a person does not have symptoms.

Scientists study screening tests to find those with the fewest harms and most benefits. Cancer screening trials also are meant to show whether early detection (finding cancer before it causes symptoms) helps a person live longer or decreases a person’s chance of dying from the disease. For some types of cancer, the chance of recovery is better if the disease is found and treated at an early stage.

### Mammography is the most common screening test for breast cancer.

A mammogram is a picture of the inside of the breast. Mammography may find tumors that are too small to feel. It may also find ductal carcinoma in situ (DCIS). In DCIS, abnormal cells line the breast duct, and in some women may become invasive breast cancer.

There are different types of mammograms:

- Screen-film mammography (SFM) is an x-ray picture of the breast.
- Digital mammography (DM) is a computer picture of the breast.
- Digital breast tomosynthesis (DBT) uses x-rays to take a series of pictures of the inside of the breast from many different angles. A computer is used to make 3-D pictures of the breast from these x-rays.
- Synthetic 2-dimensional mammography (S2D) uses x-rays to take pictures of the inside of the breast, usually from two different angles. A computer or x-ray film is used to make 2-D pictures of the breast.

Digital breast tomosynthesis (DBT) was approved by the U.S. Food and Drug Administration (FDA) in 2018 and is now used in 3 out of 4 facilities. One recent study found that synthetic 2-dimensional mammography (S2D) combined with DBT improved tumor detection rates and lowered mammogram callbacks, radiation dose, and overall costs. More studies are being done to compare different types of breast cancer screening.

Mammography is less likely to find breast tumors in women with dense breast tissue. Because both tumors and dense breast tissue appear white on a mammogram, it can be harder to find a tumor when there is dense breast tissue. Younger women are more likely to have dense breast tissue. To learn more, visit Dense Breasts: Answers to Commonly Asked Questions (https://www.cancer.gov/types/breast/breast-changes/dense-breasts).

Mammography is an imaging test used to screen for and diagnose breast cancer. It can detect abnormal breast tissue, including cancer, sometimes before symptoms appear.

Drawing of a woman standing with her left breast pressed between two plates of a mammography machine. Behind her, a health professional uses an X-ray machine to take pictures of the breast. An inset shows the X-ray film image with an arrow pointed at abnormal tissue.

Many factors affect whether mammography is able to detect (find) breast cancer:

- The age and weight of the patient.
- The size and type of tumor.
- Where the tumor has formed in the breast.
- How sensitive the breast tissue is to hormones.
- How dense the breast tissue is.
- The timing of the mammography within the woman's menstrual cycle.
- The quality of the mammogram picture.
- The skill of the radiologist in reading the mammogram.

Women aged 50 to 69 years who have screening mammograms have a lower chance of dying from breast cancer than women who do not have screening mammograms.

Fewer women are dying of breast cancer in the United States, but it is not known whether the lower risk of dying is because the cancer was found early by screening or whether the treatments were better.

### Magnetic resonance imaging (MRI) may be used to screen women who have a high risk of breast cancer.

MRI is a procedure that uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the body. This procedure is also called nuclear magnetic resonance imaging (NMRI). MRI does not use any x-rays, and the woman is not exposed to radiation.

An MRI of the breast is a procedure that uses radio waves, a strong magnet, and a computer to create detailed pictures of the inside of the breast. A contrast dye may be injected into a vein (not shown) to make the breast tissues easier to see on the MRI pictures. An MRI may be used with other breast imaging tests to detect breast cancer or other abnormal changes in the breast. It may also be used to screen for breast cancer in some people who have a high risk of the disease. Note: The inset shows an MRI image of the insides of both breasts. Credit for inset: The Cancer Imaging Archive (TCIA).

MRI of the breast; drawing shows a person lying face down on a narrow, padded table with their arms above their head. The person’s breasts hang down into an opening in the table. The table slides into the MRI machine, which takes detailed pictures of the inside of the breast. An inset shows an MRI image of the insides of both breasts.

MRI may be used as a screening test for women who have a high risk of breast cancer. Factors that put women at high risk include:

- Certain gene changes, such as changes in the BRCA1 or BRCA2 gene.
- A family history of breast cancer in a first-degree relative, such as a mother, daughter, or sister.
- Certain genetic syndromes, such as Li-Fraumeni syndrome or Cowden syndrome.

An MRI is more likely than mammography to find a breast mass (lump) that is not cancer.

Women with dense breasts who have supplemental screening (for example, an MRI) show higher rates of breast cancer detection, but there is limited evidence about whether this leads to better health outcomes.

### Whether a woman should be screened for breast cancer and the screening test to use depends on certain factors.

Women with risk factors for breast cancer, such as certain changes in the BRCA1 or BRCA2 gene or certain genetic syndromes, may be screened at a younger age and more often.

Women who have had radiation treatment to the chest, especially at a young age, may start routine breast cancer screening at an earlier age. The benefits and risks of mammograms and MRIs for these women have not been studied.

Breast cancer screening has not been shown to benefit the following women:

- Older women who, if diagnosed with breast cancer through screening, will usually die of other causes. Screening mammograms for those aged 66 to 79 years may find cancer in a very small percentage of women, but most of these cancers are low risk.
- In women with an average risk of developing breast cancer, screening mammography before age 40 has not shown any benefit.
- In women who are not expected to live for a long time and have other diseases or conditions, finding and treating early-stage breast cancer may reduce their quality of life without helping them live longer.

### Other screening tests have been or are being studied in clinical trials.

Studies have been done to find out if the following breast cancer screening tests are useful in finding breast cancer or helping women with breast cancer live longer.

#### Breast exam

A clinical breast exam is an exam of the breast by a doctor or other health professional. He or she will carefully feel the breasts and under the arms for lumps or anything else that seems unusual. It is not known if having clinical breast exams decreases the chance of dying from breast cancer.

Breast self-exams may be done by women or men to check their breasts for lumps or other changes. If you feel any lumps or notice any other changes in your breasts, talk to your doctor. Doing regular breast self-exams has not been shown to decrease the chance of dying from breast cancer.

#### Thermography

Thermography is a procedure in which a special camera that senses heat is used to record the temperature of the skin that covers the breasts. Tumors can cause temperature changes that may show up on the thermogram.

There have been no randomized clinical trials of thermography to find out how well it detects breast cancer or the harms of the procedure.

#### Tissue sampling

Breast tissue sampling is taking cells from breast tissue to check under a microscope. Breast tissue sampling as a screening test has not been shown to decrease the risk of dying from breast cancer.

#### Ultrasound exam

A procedure in which high-energy sound waves are bounced off internal tissues or organs and make echoes. The echoes form a picture of body tissues called a sonogram.

An ultrasound is sometimes used as an additional screening test for women who are at increased risk of developing breast cancer (such as women with dense breasts). It is not known if supplemental screening with ultrasound leads to better health outcomes.

### Screening tests for breast cancer are being studied in clinical trials.

Information about clinical trials supported by NCI can be found on NCI’s clinical trials search (https://www.cancer.gov/research/participate/clinical-trials-search) webpage. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

## Harms of Breast Cancer Screening

Key Points for This Section
- Screening tests can have harms.
- The harms of mammography include:
  - False-positive test results can occur.
  - False-positive results can lead to extra testing and cause anxiety.
  - False-negative test results can delay diagnosis and treatment.
  - Finding breast cancer may lead to breast cancer treatment and side effects, but it may not improve a woman's health or help her live longer.
  - Mammography exposes the breast to low doses of radiation.
  - There may be pain or x-ray discomfort during a mammogram.
- Talk to your doctor about your risk of breast cancer and your need for screening tests.

### Screening tests can have harms.

Not all breast cancers will cause death or illness in a woman's lifetime, so they may not need to be found or treated.

Decisions about screening tests can be difficult. Not all screening tests are helpful and most have harms. Before having any screening test, you may want to discuss the test with your doctor. It is important to know the harms of the test and whether it has been proven to reduce the risk of dying from cancer.

### The harms of mammography include:

#### False-positive test results can occur.

Screening test results may appear to be abnormal even though no cancer is present. A false-positive test result (one that shows there is cancer when there really isn't) is usually followed by more tests (such as biopsy), which also have risks.

When a breast biopsy result is abnormal, getting a second opinion from a different pathologist may confirm a correct breast cancer diagnosis.

Most abnormal test results turn out not to be cancer. False-positive results are more common in:

- Younger women (under age 50).
- Women who have had previous breast biopsies.
- Women with a family history of breast cancer.
- Women who take hormones for menopause.

False-positive results are more likely the first time screening mammography is done than with later screenings. For every 10 women who have a single mammogram, 1 will have a false-positive result. The chance of having a false-positive result goes up the more mammograms a woman has. Comparing a current mammogram with a past mammogram lowers the risk of a false-positive result.

The skill of the radiologist also can affect the chance of a false-positive result.

#### False-positive results can lead to extra testing and cause anxiety.

If a mammogram is abnormal, more tests may be done to diagnose cancer. Women can become anxious during the diagnostic testing. Even if it is a false-positive test and cancer is not diagnosed, the result can lead to anxiety anywhere from a few days to years later.

Several studies show that women who feel anxiety after false-positive test results are more likely to schedule regular breast screening exams in the future.

#### False-negative test results can delay diagnosis and treatment.

Screening test results may appear to be normal even though breast cancer is present. This is called a false-negative test result. A woman who has a false-negative test result may delay seeking medical care even if she has symptoms. About 1 in 5 cancers are missed by mammography.

The chance of a false-negative test result is more common in women who:

- Are younger.
- Have dense breast tissue.
- Have cancer that is not dependent on hormones (estrogen and progesterone).
- Have cancer that is fast growing.

#### Finding breast cancer may lead to breast cancer treatment and side effects, but it may not improve a woman's health or help her live longer.

Some breast cancers found only by screening mammography may never cause health problems or become life-threatening. Finding these cancers is called overdiagnosis. When these cancers are found, having treatment may cause serious side effects and may not lead to a longer, healthier life.

#### Mammography exposes the breast to low doses of radiation.

Being exposed to high doses of radiation is a risk factor for breast cancer. The radiation dose used with a mammogram is very low. Women who start getting mammograms at age 50 and continue getting them every 2 years have a lower risk of developing breast cancer from radiation exposure during a mammogram than women who start getting mammograms at age 40 and continue getting them every year. Women with large breasts or with breast implants may be exposed to slightly higher radiation doses during screening mammography.

#### There may be pain or x-ray discomfort during a mammogram.

During a mammogram, the breast is placed between two plates that are pressed together. Pressing the breast helps to get a better image of the breast. Some women have pain or discomfort during a mammogram. The amount of pain may also depend on:

- The phase of the woman's menstrual cycle.
- The woman's anxiety level.
- How much pain the woman expected.

### Talk to your doctor about your risk of breast cancer and your need for screening tests.

Talk to your doctor or other health care provider about your risk of breast cancer, whether a screening test is right for you, and the benefits and harms of the screening test. You should take part in the decision about whether you want to have a screening test, based on what is best for you. To learn more, visit Cancer Screening Overview.

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about breast cancer screening. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Screening and Prevention Editorial Board. PDQ Breast Cancer Screening. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/breast/patient/breast-screening-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389160]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).